# Medicinal Mushrooms (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of medicinal mushrooms in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Medicinal mushrooms have been used for hundreds of years, mainly in Asian countries, for treatment of infections. More recently, they have also been used in the treatment of pulmonary diseases and cancer. Medicinal mushrooms have been approved adjuncts to standard cancer treatments in Japan and China for more than 30 years and have an extensive clinical history of safe use as single agents or combined with radiation therapy or chemotherapy.

More than 100 species of medicinal mushrooms are used in Asia. Some of the more commonly used species include the following:

- Ganoderma lucidum (reishi).
- Trametes versicolor or Coriolus versicolor (turkey tail).
- Lentinus edodes (shiitake).
- Grifola frondosa (maitake).

Studies have examined the effects of mushrooms on immune response pathways and on direct antitumor mechanisms. The immune effects are mediated through the mushroom's stimulation of innate immune cells, such as monocytes, natural killer cells, and dendritic cells. The activity is generally considered to be caused by the presence of high-molecular-weight polysaccharides (beta-glucans) in the mushrooms, although other constituents may also be involved. Clinical trials in cancer patients have demonstrated that G. lucidum products are generally well tolerated.[1]

Several companies distribute medicinal mushrooms as dietary supplements. In the United States, dietary supplements are regulated by the U.S. Food and Drug Administration (FDA) as a separate category from foods, cosmetics, and drugs. Unlike drugs, dietary supplements do not require premarket evaluation and approval by the FDA unless specific disease prevention or treatment claims are made. The quality and amount of ingredients in dietary supplements are also regulated by the FDA through Good Manufacturing Practices (GMPs). The FDA GMPs requires that every finished batch of dietary supplement meets each product specification for identity, purity, strength, composition, and limits on contamination that may adulterate dietary supplements. Because dietary supplements are not formally reviewed for manufacturing consistency every year, ingredients may vary considerably from lot to lot and there is no guarantee that ingredients claimed on product labels are present (or are present in the specified amounts). The FDA has not approved the use of medicinal mushrooms as a treatment for cancer or any other medical condition.

Many of the medical and scientific terms used in this summary are hypertext linked (at first use in each section) to the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/), which is oriented toward nonexperts. When a linked term is clicked, a definition will appear in a separate window.

Reference citations in some PDQ cancer information summaries may include links to external websites that are operated by individuals or organizations for the purpose of marketing or advocating the use of specific treatments or products. These reference citations are included for informational purposes only. Their inclusion should not be viewed as an endorsement of the content of the websites, or of any treatment or product, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board or the National Cancer Institute.

### References

Jin X, Ruiz Beguerie J, Sze DM, et al.: Ganoderma lucidum (Reishi mushroom) for cancer treatment. Cochrane Database Syst Rev 6: CD007731, 2012.22696372

## Turkey Tail and Polysaccharide-K

### General Information

Turkey tail is a woody bracket polypore fungus that grows on dead logs worldwide. The scientific name of turkey tail is Trametes versicolor (L.) Lloyd, although it has been known by other names, notably Coriolus versicolor (L. ex Fr.) Quel. It is known as Yun Zhi in traditional Chinese medicine and Kawaratake (roof tile fungus) in Japan. The name turkey tail refers to its concentric rings of brown and tan, which resemble the tail feathers of a turkey. There are many other species of Trametes, some of which are difficult to distinguish from turkey tail. Internal transcribed spacer sequences alone have been found inadequate to distinguish turkey tail from other species of Trametes, so additional molecular characters are required for that task.[1] Another Trametes species used primarily in China is Trametes robiniophila Murr, also known as Huaier.

### History

The fungus has been used in traditional Chinese medicine for many years to treat pulmonary diseases.[2,3] A purified hot water extract prepared from the cultivated fungal mycelium has been used in Japan for its immunomodulatory effects as an adjuvant treatment for cancer.[4-6] Polysaccharide-K (PSK) or krestin, from the mushroom T. versicolor, is an approved mushroom product used for cancer treatment in Japan. PSK is a proprietary formulation from the Kureha Corporation. PSK has been used as an adjunctive cancer treatment in thousands of patients since the mid-1970s. The safety record for PSK is well established in Japan. Few adverse events have been reported in patients treated with PSK. Polysaccharopeptide (PSP) is another extract from T. versicolor produced in China.

### Laboratory/Animal/Preclinical Studies

#### Chemistry

The best known constituent of turkey tail is the glycoprotein mixture known as PSK. PSK is not a homogeneous substance, with a range of molecular weights averaging 9.4 kDa (range 5–300 kDa). The glycoprotein molecules are composed of a main chain beta-(1,4) glucan with beta-(1,3)– and beta-(1,6)–linked side chains. Small amounts of galactose, mannose, and arabinose have also been detected in the hydrolysate. Between 25% and 38% of the mass comes from a covalently linked protein whose amino acid composition has been reported.[4]

PSK radiolabeled with carbon C-14 has been used to study the oral bioavailability and distribution of PSK in mice, rats, and rabbits. A fraction of the dose appears to be orally absorbed, more or less intact, and is excreted in bile over several hours. However, most of the radiolabeled dose is found in exhaled air, suggesting that the digestion of PSK may occur in the gut or the metabolism of absorbed PSK may occur somewhere else in the body.[7] A monoclonal antibody (specific for PSK) that neutralizes PSK's antitumor effects has been developed. It has been used to validate the presence of PSK in implanted tumors.[8]

PSP, a very similar substance, has also been purified from a different strain of turkey tail; PSP and PSK differ somewhat in sugar composition.[2]

A lipid component of PSK has been separated by lipase treatment and found to have toll-like receptor 2 agonist activity, synergistic with the protein-bound beta-glucan. The lipid component was primarily linoleic acid, with smaller amounts of other fatty acids.[9]

The nonselective protein kinase inhibitor hypothemycin [10] and the adipocyte fat accumulation–inhibitory cyclic peptide ternatin [11] have also been isolated from cultures of T. versicolor.

#### Mechanistic studies

Since the earliest reports of clinical benefits, other investigators have sought to define the mechanism of PSK’s beneficial action. One group hypothesized that T-cell dysfunction, including apoptosis of peripheral blood T cells, commonly occurs in patients receiving chemotherapy.[12] They postulated that reversal of T-cell dysfunction induced by chemotherapy could reduce the adverse effects or enhance the antitumor effect. PSK is reported to enhance natural killer (NK) cell and T-cell activities by upregulation of interleukin-2 or interferon-gamma. Twenty patients with curatively resected stage III gastric cancer were randomly assigned to receive adjuvant therapy with the second-generation dihydropyrimidine dehydrogenase–inhibitory oral fluoropyrimidine S-1 alone (n = 10) or S-1 plus PSK (n = 10). At 5 weeks after adjuvant therapy, T-cell apoptosis was significantly higher in the S-1–alone group than in the S-1–plus-PSK group, leading the authors to conclude that PSK could partially prevent the T-cell apoptosis induced by S-1.

Another group of investigators studied the effect of PSK added to tegafur-uracil (UFT) chemotherapy compared with that of UFT alone.[13] Baseline immune parameters were comparable in the two groups. However, CD57-positive T cells decreased more significantly after surgery for patients treated with PSK than for those in the control group (P = .0486). These investigators had previously noted that a high CD57-positive cell count was an indicator of poor prognosis in patients with advanced gastric cancer, leading them to suggest that PSK may improve overall survival (OS) partly by inhibiting CD57-positive T cells.

Noting that hosts become immunocompromised at the time of tumor progression and that decreased expression of major histocompatibility complex (MHC) class I by the tumor is one mechanism that allows it to evade destruction by cytotoxic T lymphocytes, investigators conducted a retrospective study to evaluate the expression of MHC class I by immunohistochemical staining in the primary lesions of patients with stage II or stage III gastric cancer.[14] They analyzed data from 349 patients who had undergone adjuvant therapy (after curative resection) between 1995 and 2008; 225 patients received adjuvant chemotherapy with an oral fluoropyrimidine alone, while 124 patients received adjuvant chemotherapy plus PSK 3 g/d. Although this was not a randomized trial, baseline characteristics of the patients were well matched. The mean duration of follow-up was 49 months. Three-year recurrence-free survival (RFS) rates were the same for both groups (60% for the PSK group and 62% for the chemotherapy-only group). For MHC expression–negative cases, the 3-year RFS rates were 65% for the PSK group and 50% for the chemotherapy-only group; the difference was not considered significant. For 82 MHC expression–negative patients with lymph node status of pN2 or greater, the RFS rates were 65% for the PSK group and 34% for the chemotherapy-only group—a significant difference with no P value offered. The authors concluded that PSK adjuvant immunotherapy may be effective in MHC class I–negative patients with advanced lymph node metastasis of pN2 or greater.

While the mechanism of action for PSK in general and in colorectal cancer specifically is not clearly defined, the potential activity of PSK as an immunomodulatory adjunct to chemoradiation therapy in rectal cancer has been studied.[15] Thirty patients with stage II or III rectal cancer who were treated with S-1 and external-beam radiation therapy were randomly assigned to receive either the standard regimen or standard regimen plus PSK. A number of cellular and humoral immune parameters were tested. An increase in peripheral blood NK cells after therapy was observed in the PSK-treated group compared with the control group. Immunosuppressive acidic protein (IAP) levels have been reported to be elevated in cancer patients and correlated to cancer progression and prognosis. In the study, a more-marked decrease in IAP level was observed in patients treated with PSK than in those treated in the control group. In addition, cytotoxic T cells increased in the peritumoral mucosa and normal mucosa within the radiation field in the PSK-treated group. The authors of the study concluded that PSK treatment may promote local tissue immunity within the radiation field.

One review included preclinical studies conducted in lung cancer models using either PSK or other T. versicolor preparations.[16] Data from the 15 preclinical studies supported the anticancer effects of PSK by way of immunomodulation and potentiation of immune surveillance. In animal models, direct antitumor effects resulted in reduced tumor growth and metastases.

### Human Studies

#### Gastric cancer

##### Observational studies

Gastric cancer is the most common malignancy diagnosed in Korea. Investigators in Korea performed a retrospective analysis of survival in patients who received PSK in addition to chemotherapy and in those who received chemotherapy only (control group).[17] Unfortunately, the chemotherapy regimens differed in that the PSK patients were treated with fluorouracil and mitomycin-C (207 patients), while the controls received fluorouracil with doxorubicin-based chemotherapy (103 patients), introducing a potential bias in the interpretation of the results. Patients with all stages of gastric cancer were included in the analysis. Overall, there was no difference between groups in 5-year disease-free survival (DFS) or progression-free survival (PFS) rates. In a subgroup analysis, PSK recipients with stage IB or stage II disease showed superior 5-year survival (84.4% vs. 67.6%; P = .019), but no significant benefit was observed in patients with higher-stage disease.

Another retrospective analysis of nonrandomized data evaluated 254 patients with gastric carcinoma undergoing curative surgery with postoperative adjuvant treatment in Japan.[18] Researchers compared 139 patients who received chemotherapy alone with 115 patients who received chemotherapy plus PSK. There were no significant differences between groups in patient demographics or tumor characteristics at baseline. There were no differences between groups in 5-year RFS rates (52.7% in the PSK group and 52.7% in the control group) or 5-year OS rates (57.1% in the PSK group and 58.3% in the control group). In a subset analysis of patients with more than seven involved lymph nodes (pN3), the 5-year OS rate was significantly higher in the PSK group (47.8%) than that in the control group (22.8%; P = .0317). Hence, these results contradict the findings from the Korean analysis.

##### Clinical trials

A study published in 1994 first suggested the clinical benefit of adjuvant PSK for patients who underwent curative resection of gastric cancer in Japan.[19] Investigators randomly assigned 262 patients who had undergone curative gastrectomy to receive either standard treatment with intravenous mitomycin and oral fluorouracil, or chemotherapy plus protein-bound PSK. Patients were monitored for 5 to 7 years. PSK improved both the 5-year DFS rate (70.7% vs. 59.4%; P = .047) and 5-year survival rate (73.0% vs. 60.0%; P = .044), compared with the standard treatment group. Treatment with PSK was well tolerated, with good compliance. The authors concluded that PSK should be added to standard chemotherapy for gastric cancer patients who undergo curative gastrectomy.

A 2007 meta-analysis included 8,009 patients from eight randomized controlled trials (RCTs) of adjuvant PSK in patients after curative resection of gastric cancers:[20] 4,037 patients received PSK with chemotherapy, and 3,972 patients received the same chemotherapy alone. The OS hazard ratio (HR) was 0.88 (95% confidence interval [CI], 0.79–0.98; P = .018), indicating improved survival with the addition of PSK, with no significant heterogeneity between the treatment effects observed in the different studies. The three trials with the best quality supported the findings from the eight studies. The authors concluded that PSK was effective as adjuvant immunotherapy for patients with gastric cancer and suggested that this improvement may well be both statistically and clinically significant.

One other large study not included in this meta-analysis was a Japanese multicenter comparative trial of adjuvant chemotherapy versus adjuvant chemotherapy and PSK involving 751 patients undergoing curative resection, conducted from 1978 to 1981.[21] Patients were randomly assigned to receive either chemotherapy with mitomycin-C plus oral tegafur (also known as futraful) with (n = 377) or without (n = 374) PSK 3 g/d. After reviewing 20 years of data, the investigators stratified patients on the basis of the ratio of their granulocytes to lymphocytes (G/L), believing that G/L ratios above 2.0 would predict responders. The 5-year OS rates were 67.9% in the PSK group and 61.8% in the control group (P = .053). In the subset of 364 patients with G/L ratios above 2.0, 5-year survival rates were 68.7% in the PSK group and 55.4% in the control group (P = .007). Because the G/L ratio was not related to stage, the authors suggested that the G/L ratio may be a host-dependent factor and might be useful to predict who might respond best to adjuvant PSK.

Finally, another small study has been reported since the meta-analysis.[13] Patients received either oral UFT 300 mg/d or UFT plus PSK 3 g/d for at least 1 year after undergoing gastric resection for stage II or stage III gastric cancer. The 3-year survival rate was 62.2% in the 10 patients who received PSK and 12.5% in the 11 patients who received UFT alone (P = .038).

#### Breast cancer

So far, studies that have reported on the use of T. versicolor products in patients with breast cancer have focused on documenting changes in immune parameters (e.g., changes in T-cell subsets and B-cell numbers in blood) as opposed to clinical parameters (e.g., patient survival, resolution of symptoms/side effects, or improvement in quality of life).[22,23]

#### Colorectal cancer

##### Observational studies

A retrospective study was conducted by two groups from Japan. The study examined the impact on survival in patients with colorectal cancer who received adjuvant treatment with oral fluoropyrimidine with the addition of PSK.[24,25] The first study was conducted at a single institution in Japan and analyzed outcomes from 101 patients with Dukes B or Dukes C colorectal cancer who were treated with UFT or UFT with PSK for 24 months after curative surgery. These patients were monitored for up to 10 years after surgery.[25] The 10-year survival rate was significantly better for patients treated with PSK (HR, 0.3). The second study examined the results of 63 patients with colorectal cancer who were older than 70 years and treated with UFT with or without PSK. The 3-year relapse-free survival rates were 76.2% in the PSK group and 47.8% in the UFT-only group (control). The 3-year OS rates were 80.8% in the PSK group and 52.8% in the control group.[24]

##### Clinical trials

Clinical studies of PSK in colorectal cancer have shown reduction in recurrence and improvement in OS with adjuvant use.

A meta-analysis of randomized, centrally assigned, prospective clinical trials of adjuvant therapy with PSK published between 1980 and 2004 identified three clinical trials that met selection criteria covering 1,094 patients.[26] Combining the data from all three trials, the researchers found that the estimated odds ratio (OR) for the following:

- The 5-year DFS was 0.72 (95% CI, 0.58–0.90; P = .003, favoring PSK).
- The 5-year OS was 0.71 (95% CI, 0.55–0.90; P = .006, favoring PSK).

#### Lung cancer

##### Clinical trials

Thirty-one reports of 28 studies were included in a systematic review of PSK in lung cancer:[16]

- Seventeen preclinical studies.
- Five nonrandomized controlled trials.
- Six RCTs.

All five nonrandomized controlled trials reported improved median survival with the use of PSK in combination with conventional radiation therapy and/or chemotherapy. PSK 3 g/d with concurrent chemotherapy was used in all RCTs, and all six studies showed benefit for at least one of the following endpoints:

- Immune function measures.
- Body weight.
- Performance status.
- Tumor-related symptoms.
- Survival.

Table 1. Clinical Studies of Turkey Tail^a^

Reference | Trial Design | Product and Dose | Condition or Cancer Type | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Results | Concurrent Therapy Used | Level of Evidence Score^c^
[21] | RCT | PSK (3 g/d) | Gastric cancer | 751; 376; 374 (groups were stratified by G/L ratio of <2 vs. >2) | Overall 5-y survival: all patients, 67.9% (PSK) versus 61.8% (control) (P = .053); for G/L ratio ≥2: 68.7% (PSK) versus 55.4% (control) (P = .007) | Mitomycin-C plus tegafur | 1iDii
[19] | RCT | PSK (3 g/d) | Gastric cancer | 262; 124; 129 | Improved survival in the treatment group was clinically significant | Mitomycin-C plus oral fluorouracil | 1iDii
[13] | RCT | PSK (3 g/d) | Gastric cancer | 21; 10; 11 | Survival was improved significantly in treatment group | UFT 300 mg/d starting 2 wk after surgery and continuing for 1 y or until diagnosis of tumor recurrence | 1iDii
[27] | Meta-analysis summarizing 48 studies | PSK (various doses) | Colorectal cancer | 3 trials; 1,094 patients | 5-y survival: 79.0% (chemotherapy plus PSK) versus 72.2% (chemotherapy alone) (OR, 0.71; P = .006) | Mitomycin-C plus long-term administration of oral fluorinated pyrimidines | 1iB

G/L = granulocyte to lymphocyte count; OR = odds ratio; PSK = polysaccharide-K; RCT = randomized controlled trial; UFT = tegafur-uracil.

^a^For more information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Strongest evidence reported that the treatment under study has activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### References

Carlson A, Justo A, Hibbett DS: Species delimitation in Trametes: a comparison of ITS, RPB1, RPB2 and TEF1 gene phylogenies. Mycologia 106 (4): 735-45, 2014 Jul-Aug.24898532
Ng TB: A review of research on the protein-bound polysaccharide (polysaccharopeptide, PSP) from the mushroom Coriolus versicolor (Basidiomycetes: Polyporaceae). Gen Pharmacol 30 (1): 1-4, 1998.9457474
Ying J, Mao X, Ma Q, et al.: Icons of Medicinal Fungi from China. Science Press, 1987.
Tsukagoshi S, Hashimoto Y, Fujii G, et al.: Krestin (PSK). Cancer Treat Rev 11 (2): 131-55, 1984.6238674
Cui J, Chisti Y: Polysaccharopeptides of Coriolus versicolor: physiological activity, uses, and production. Biotechnol Adv 21 (2): 109-22, 2003.14499133
Sakagami H, Aoki T, Simpson A, et al.: Induction of immunopotentiation activity by a protein-bound polysaccharide, PSK (review). Anticancer Res 11 (2): 993-9, 1991 Mar-Apr.2064356
Ikuzawa M, Matsunaga K, Nishiyama S, et al.: Fate and distribution of an antitumor protein-bound polysaccharide PSK (Krestin). Int J Immunopharmacol 10 (4): 415-23, 1988.3170055
Hoshi H, Saito H, Iijima H, et al.: Anti-protein-bound polysaccharide-K monoclonal antibody binds the active structure and neutralizes direct antitumor action of the compound. Oncol Rep 25 (4): 905-13, 2011.21249323
Quayle K, Coy C, Standish L, et al.: The TLR2 agonist in polysaccharide-K is a structurally distinct lipid which acts synergistically with the protein-bound β-glucan. J Nat Med 69 (2): 198-208, 2015.25510899
Miller RM, Taunton J: Targeting protein kinases with selective and semipromiscuous covalent inhibitors. Methods Enzymol 548: 93-116, 2014.25399643
Miller R, Galitsky NM, Duax WL, et al.: Molecular structures of two crystalline forms of the cyclic heptapeptide antibiotic ternatin, cyclo[-beta-OH-D-Leu-D-Ile-(NMe)Ala-(NMe)Leu-Leu-(NMe)Ala-D-(NMe)Ala-]. Int J Pept Protein Res 42 (6): 539-49, 1993.8307686
Kono K, Kawaguchi Y, Mizukami Y, et al.: Protein-bound polysaccharide K partially prevents apoptosis of circulating T cells induced by anti-cancer drug S-1 in patients with gastric cancer. Oncology 74 (3-4): 143-9, 2008.18708731
Akagi J, Baba H: PSK may suppress CD57(+) T cells to improve survival of advanced gastric cancer patients. Int J Clin Oncol 15 (2): 145-52, 2010.20229169
Ito G, Tanaka H, Ohira M, et al.: Correlation between efficacy of PSK postoperative adjuvant immunochemotherapy for gastric cancer and expression of MHC class I. Exp Ther Med 3 (6): 925-930, 2012.22969994
Sadahiro S, Suzuki T, Maeda Y, et al.: Effects of preoperative immunochemoradiotherapy and chemoradiotherapy on immune responses in patients with rectal adenocarcinoma. Anticancer Res 30 (3): 993-9, 2010.20393026
Fritz H, Kennedy DA, Ishii M, et al.: Polysaccharide K and Coriolus versicolor extracts for lung cancer: a systematic review. Integr Cancer Ther 14 (3): 201-11, 2015.25784670
Choi JH, Kim YB, Lim HY, et al.: 5-fluorouracil, mitomycin-C, and polysaccharide-K adjuvant chemoimmunotherapy for locally advanced gastric cancer: the prognostic significance of frequent perineural invasion. Hepatogastroenterology 54 (73): 290-7, 2007 Jan-Feb.17419278
Tanaka H, Muguruma K, Ohira M, et al.: Impact of adjuvant immunochemotherapy using protein-bound polysaccharide-K on overall survival of patients with gastric cancer. Anticancer Res 32 (8): 3427-33, 2012.22843926
Nakazato H, Koike A, Saji S, et al.: Efficacy of immunochemotherapy as adjuvant treatment after curative resection of gastric cancer. Study Group of Immunochemotherapy with PSK for Gastric Cancer. Lancet 343 (8906): 1122-6, 1994.7910230
Oba K, Teramukai S, Kobayashi M, et al.: Efficacy of adjuvant immunochemotherapy with polysaccharide K for patients with curative resections of gastric cancer. Cancer Immunol Immunother 56 (6): 905-11, 2007.17106715
Toge T, Yamaguchi Y: Protein-bound polysaccharide increases survival in resected gastric cancer cases stratified with a preoperative granulocyte and lymphocyte count. Oncol Rep 7 (5): 1157-61, 2000 Sep-Oct.10948356
Wong CK, Bao YX, Wong EL, et al.: Immunomodulatory activities of Yunzhi and Danshen in post-treatment breast cancer patients. Am J Chin Med 33 (3): 381-95, 2005.16047556
Torkelson CJ, Sweet E, Martzen MR, et al.: Phase 1 Clinical Trial of Trametes versicolor in Women with Breast Cancer. ISRN Oncol 2012: 251632, 2012.22701186
Yoshitani S, Takashima S: Efficacy of postoperative UFT (Tegafur/Uracil) plus PSK therapies in elderly patients with resected colorectal cancer. Cancer Biother Radiopharm 24 (1): 35-40, 2009.19243246
Sakai T, Yamashita Y, Maekawa T, et al.: Immunochemotherapy with PSK and fluoropyrimidines improves long-term prognosis for curatively resected colorectal cancer. Cancer Biother Radiopharm 23 (4): 461-7, 2008.18771350
Pilkington K, Wieland LS, Teng L, et al.: Coriolus (Trametes) versicolor mushroom to reduce adverse effects from chemotherapy or radiotherapy in people with colorectal cancer. Cochrane Database Syst Rev 11 (11): CD012053, 2022.36445793
Sakamoto J, Morita S, Oba K, et al.: Efficacy of adjuvant immunochemotherapy with polysaccharide K for patients with curatively resected colorectal cancer: a meta-analysis of centrally randomized controlled clinical trials. Cancer Immunol Immunother 55 (4): 404-11, 2006.16133112

## Reishi (Ganoderma lucidum)

### General Information

Ganoderma is a genus of woody polypore fungi which grow on live trees. In the Chinese Pharmacopeia, the official species are Ganoderma lucidum (Leyss. ex Fr.) P. Karst and Ganoderma sinense Zhao, Xu et Zhang. Another commonly encountered species is Ganoderma lingzhi Wu, Cao et Dai. In traditional Chinese medicine, the fungi are collectively known as Ling Zhi; in Japan, they are known as Reishi. In China, G. lucidum is known as Chizhi and G. sinense is known as Zizhi.

Recent molecular taxonomic and chemical studies have made it clear that the originally described European species G. lucidum and the East Asian medicinal species are not identical.[1-5] The newly accepted name for the East Asian species traditionally called G. lucidum is Ganoderma sichuanense. However, most research worldwide has been published under the name G. lucidum. This includes the full genome sequence of G. lucidum.[6] There are many other species of Ganoderma, which are difficult to distinguish from the medicinal species.[5]

### History

Ganoderma has a very long history in East Asia as a medicinal mushroom dating back to the Chinese materia medica “Shen Nung Ben Cao Jing,” written between 206 BC and 8 AD. It was considered a superior tonic for prolonging life, preventing aging, and boosting qi. It has been associated with royalty, perhaps due to its rarity in the wild. It was also revered in Japanese culture. It is used by contemporary Chinese physicians to support immune function in patients undergoing chemotherapy or radiation therapy for cancer, among other uses.[7] In some parts of the world (e.g., Shanghai), cancer patients commonly use supplements containing Ganoderma lucidum.[8] The development of improved Ganoderma products is currently under way using biotechnological processes.[9]

### Laboratory/Animal/Preclinical Studies

#### Chemistry

Among the biologically active components of G. lucidum are triterpenoids, polysaccharides, lipids, and proteins.[10-12] Most laboratory research studies have utilized G. lucidum products obtained via any of several extraction processes, which produce products that contain a mixture of two or more of these molecular species. This lack of purity of the products under study may account for some of the overlap of biological activities attributed to the individual components.

The best-studied Ganoderma polysaccharides possess mostly 1,3- and 1,4-glycosidic linkages, which are of high molecular weight.[10] Beta-glucans are known to bind to the complement receptor CR3.[13] The activity is considered to be immunomodulatory in nature, similar to many other medicinal fungi. It has recently been pointed out that Ganoderma products derived from mycelium grown on different grain substrates contain large amounts of alpha-glucans derived from the substrate, compared with the fruiting body and its extracts, which are entirely beta-glucan in nature.[14]

Many Ganoderma species produce large amounts of oxidized lanostane triterpenes in a complex mixture. Ganoderma triterpenes are unique to the genus. Some G. lucidum triterpenes have been found to inhibit cancer cell line growth, although many of the major triterpenes are relatively weak inhibitors or inactive.[15-17] Analytical studies have examined the relative amounts of the different triterpenes in fruiting bodies, as well as in mycelial preparations.[18,19] The mammalian metabolism of the triterpenes has been studied singly and in combination, with numerous sites of metabolism identified.[20]

#### In vitro studies

Several G. lucidum-derived products have been studied in preclinical models and reported to produce anticancer effects. Both triterpenoids and polysaccharides cause cell growth arrest and cytotoxicity.[21-30] Studies of the cellular pathway by which G. lucidum triterpenoids produce cytotoxicity have generally implicated apoptosis pathways, both the intrinsic or mitochondrial pathway [21,23-25,27] and the extrinsic or death receptor pathway.[29] Triterpenoids also inhibit adhesion and migration of malignant cells.[22,31,32] The lipid and protein components of G. lucidum have been less studied but also have demonstrated in vitro cytotoxicity.[33,34]

Polysaccharides from G. lucidum have been shown to induce dendritic cell maturation, thus raising the possibility that these products might support or elicit immune-mediated anticancer actions.[35]

Other potential mechanisms of anticancer activity have been demonstrated, including reports of the induction of differentiation of neuroblastoma cells in vitro [36] and the inhibition of cellular secretion of factors associated with tumor-induced angiogenesis, such as vascular endothelial growth factor (VEGF) and transforming growth factor (TGF)-beta.[37]

Ganoderenic acid B, a G. lucidum derived triterpene, has been shown to enhance the cytotoxicity of chemotherapeutic agents in a drug-resistant cell line of hepatocellular carcinoma by inhibiting the transport function of the adenosine triphosphate (ATP)-binding cassette (ABC) superfamily transporters.[38] This finding led the investigators to conclude that ganoderenic acid B may have the potential to be developed into a multidrug resistance reversal agent.

#### In vivo studies

Relatively few studies have explored the in vivo effects of G. lucidum in animal models, but those available have shown antitumor activity of triterpenoids in mice bearing Lewis lung carcinoma [39] and antitumor effects of polysaccharides in mice bearing S180 cells [40] and Ehrlich ascites cells.[41]

### Human Studies

#### Lung cancer

##### Mechanistic studies

There are no studies of G. lucidum with measured cancer outcomes. Building on the preclinical evidence that the polysaccharide fractions of G. lucidum enhance host immune function and have potential antitumor activity, investigators studied an over-the-counter product in patients with advanced stage lung cancer.[42] Patients received Ganopoly, an aqueous polysaccharide fraction extracted from G. lucidum fruiting bodies. In an open-label trial, 36 patients with advanced lung cancer at a hospital in China, enrolled and 30 were accessible for immune function after 12 weeks. The patients were treated with chemotherapy or radiation therapy, and other complementary therapies. Ganopoly was administered as 1,800 mg capsules 3 times daily before meals for 12 weeks. Treatment did not significantly alter the mean mitogenic reactivity to phytohemagglutinin; mean counts of lymphocyte subsets CD3, CD4, CD8, and CD56; mean plasma concentrations on interleukin-2, interleukin-6, or interferon-gamma; or natural killer cell activity (P > .05). The investigators noted that some patients did experience some significant changes in the parameters studied, but the group effect was null overall.

Another mechanistic study in China investigated whether G. lucidum polysaccharides could counteract the immune suppression mediated by the plasma of patients with lung cancer.[43] It is postulated that cancer cells release immunosuppressive mediators such as PGE2, TGF-beta, IL-10, and VEGF to inhibit the immune response and escape from immune surveillance. G. lucidum polysaccharides had been shown to counteract this immune suppression in an animal cell culture model; therefore, this experiment was undertaken to evaluate whether the effect could be duplicated in humans. Blood was obtained from 12 lung cancer patients. The G. lucidum polysaccharides were isolated from a boiling water extract of G. lucidum fruit bodies by ethanol precipitation. CD69 expression on mononuclear lymphocytes after phytohemagglutinin stimulation was inhibited markedly compared with controls (P = .05) after a 24-hour incubation with lung cancer patient plasma. G. lucidum polysaccharides at concentrations of 3.2 μg/mL and 12.8 µg/mL significantly antagonized this inhibition (P < .05 for both). Similar results were observed with additional assays leading the investigators to conclude that lung cancer patient plasma-induced suppression of lymphocyte activation by phytohemagglutinin may be fully or partially antagonized by G. lucidum polysaccharides, making them an attractive adjuvant in cancer treatment.

#### Colorectal cancer

##### Prevention

Japanese investigators studied a water-soluble extract from a cultured medium of G. lucidum mycelia (MAK) in patients with colorectal adenomas.[44] After being diagnosed with colorectal adenomas on colonoscopy, 123 patients were enrolled in the MAK treatment group, and 102 no-treatment controls were randomly selected from the department’s patients. The treatment group was administered 1.5 g/d of MAK for 12 months. Both groups underwent repeat colonoscopy at 12 months. The change in the number of adenomas was +0.66 +/- 0.10 in the control group and -0.42 +/- 0.10 in the treated group (P < .01). The total size of adenomas increased by 1.73 +/- 0.28 mm in the control group and decreased by -1.40 +/- 0.64 mm in the MAK group (P < .01). These results suggest that MAK may suppress the development of premalignant colorectal adenomas.

### References

Raja HA, Baker TR, Little JG, et al.: DNA barcoding for identification of consumer-relevant mushrooms: A partial solution for product certification? Food Chem 214: 383-92, 2017.27507489
Hennicke F, Cheikh-Ali Z, Liebisch T, et al.: Distinguishing commercially grown Ganoderma lucidum from Ganoderma lingzhi from Europe and East Asia on the basis of morphology, molecular phylogeny, and triterpenic acid profiles. Phytochemistry 127: 29-37, 2016.27044336
Zhang X, Xu Z, Pei H, et al.: Intraspecific Variation and Phylogenetic Relationships Are Revealed by ITS1 Secondary Structure Analysis and Single-Nucleotide Polymorphism in Ganoderma lucidum. PLoS One 12 (1): e0169042, 2017.28056060
Liao B, Chen X, Han J, et al.: Identification of commercial Ganoderma (Lingzhi) species by ITS2 sequences. Chin Med 10: 22, 2015.26300957
Hong SG, Jung HS: Phylogenetic analysis of Ganoderma based on nearly complete mitochondrial small-subunit ribosomal DNA sequences. Mycologia 96 (4): 742-55, 2004 Jul-Aug.21148895
Chen S, Xu J, Liu C, et al.: Genome sequence of the model medicinal mushroom Ganoderma lucidum. Nat Commun 3: 913, 2012.22735441
Upton R, ed.: Reishi Mushroom: Ganoderma Lucidum: Standards of Analysis, Quality Control, and Therapeutics. American Herbal Pharmacopoeia, 2000.
Bao PP, Lu W, Cui Y, et al.: Ginseng and Ganoderma lucidum use after breast cancer diagnosis and quality of life: a report from the Shanghai Breast Cancer Survival Study. PLoS One 7 (6): e39343, 2012.22745737
Boh B: Ganoderma lucidum: a potential for biotechnological production of anti-cancer and immunomodulatory drugs. Recent Pat Anticancer Drug Discov 8 (3): 255-87, 2013.23227951
Ferreira IC, Heleno SA, Reis FS, et al.: Chemical features of Ganoderma polysaccharides with antioxidant, antitumor and antimicrobial activities. Phytochemistry 114: 38-55, 2015.25457487
Baby S, Johnson AJ, Govindan B: Secondary metabolites from Ganoderma. Phytochemistry 114: 66-101, 2015.25975187
Xia Q, Zhang H, Sun X, et al.: A comprehensive review of the structure elucidation and biological activity of triterpenoids from Ganoderma spp. Molecules 19 (11): 17478-535, 2014.25361420
Yan J, Vetvicka V, Xia Y, et al.: Beta-glucan, a "specific" biologic response modifier that uses antibodies to target tumors for cytotoxic recognition by leukocyte complement receptor type 3 (CD11b/CD18). J Immunol 163 (6): 3045-52, 1999.10477568
Chilton J: A new analytical fingerprinting system for quality control of medicinal mushroom products. In: Baars JJP, Sonnenberg ASM, eds.: Science and Cultivation of Edible and Medicinal Fungi: Mushroom Science XIX. Proceedings of the 19th Congress of the International Society for Mushroom Science. International Society for Mushroom Science, 2016, pp 267-71. Also available online (https://library.wur.nl/WebQuery/wurpubs/fulltext/400213). Last accessed April 24, 2017.
Cheng CR, Yue QX, Wu ZY, et al.: Cytotoxic triterpenoids from Ganoderma lucidum. Phytochemistry 71 (13): 1579-85, 2010.20615519
Wu GS, Guo JJ, Bao JL, et al.: Anti-cancer properties of triterpenoids isolated from Ganoderma lucidum - a review. Expert Opin Investig Drugs 22 (8): 981-92, 2013.23790022
Chen S, Li X, Yong T, et al.: Cytotoxic lanostane-type triterpenoids from the fruiting bodies of Ganoderma lucidum and their structure-activity relationships. Oncotarget 8 (6): 10071-10084, 2017.28052025
Da J, Cheng CR, Yao S, et al.: A reproducible analytical system based on the multi-component analysis of triterpene acids in Ganoderma lucidum. Phytochemistry 114: 146-54, 2015.25212865
Qi Y, Zhao L, Sun HH: Development of a rapid and confirmatory method to identify ganoderic acids in ganoderma mushrooms. Front Pharmacol 3: 85, 2012.22586399
Cheng CR, Yang M, Yu K, et al.: Metabolite identification of crude extract from Ganoderma lucidum in rats using ultra-performance liquid chromatography-quadrupole time-of-flight mass spectrometry. J Chromatogr B Analyt Technol Biomed Life Sci 941: 90-9, 2013.24189202
Shang D, Li Y, Wang C, et al.: A novel polysaccharide from Se-enriched Ganoderma lucidum induces apoptosis of human breast cancer cells. Oncol Rep 25 (1): 267-72, 2011.21109986
Jiang J, Grieb B, Thyagarajan A, et al.: Ganoderic acids suppress growth and invasive behavior of breast cancer cells by modulating AP-1 and NF-kappaB signaling. Int J Mol Med 21 (5): 577-84, 2008.18425349
Liu RM, Zhong JJ: Ganoderic acid Mf and S induce mitochondria mediated apoptosis in human cervical carcinoma HeLa cells. Phytomedicine 18 (5): 349-55, 2011.21036023
Liang ZE, Yi YJ, Guo YT, et al.: Inhibition of migration and induction of apoptosis in LoVo human colon cancer cells by polysaccharides from Ganoderma lucidum. Mol Med Rep 12 (5): 7629-36, 2015.26397202
Liang Z, Yi Y, Guo Y, et al.: Chemical characterization and antitumor activities of polysaccharide extracted from Ganoderma lucidum. Int J Mol Sci 15 (5): 9103-16, 2014.24857920
Hsieh TC, Wu JM: Regulation of cell cycle transition and induction of apoptosis in HL-60 leukemia cells by the combination of Coriolus versicolor and Ganoderma lucidum. Int J Mol Med 32 (1): 251-7, 2013.23670292
Hsu CL, Yu YS, Yen GC: Lucidenic acid B induces apoptosis in human leukemia cells via a mitochondria-mediated pathway. J Agric Food Chem 56 (11): 3973-80, 2008.18481862
Ruan W, Wei Y, Popovich DG: Distinct Responses of Cytotoxic Ganoderma lucidum Triterpenoids in Human Carcinoma Cells. Phytother Res 29 (11): 1744-52, 2015.26292672
Zaidman BZ, Wasser SP, Nevo E, et al.: Androgen receptor-dependent and -independent mechanisms mediate Ganoderma lucidum activities in LNCaP prostate cancer cells. Int J Oncol 31 (4): 959-67, 2007.17786330
Wang T, Xie ZP, Huang ZS, et al.: Total triterpenoids from Ganoderma Lucidum suppresses prostate cancer cell growth by inducing growth arrest and apoptosis. J Huazhong Univ Sci Technolog Med Sci 35 (5): 736-41, 2015.26489631
Wu GS, Song YL, Yin ZQ, et al.: Ganoderiol A-enriched extract suppresses migration and adhesion of MDA-MB-231 cells by inhibiting FAK-SRC-paxillin cascade pathway. PLoS One 8 (10): e76620, 2013.24204647
Weng CJ, Chau CF, Hsieh YS, et al.: Lucidenic acid inhibits PMA-induced invasion of human hepatoma cells through inactivating MAPK/ERK signal transduction pathway and reducing binding activities of NF-kappaB and AP-1. Carcinogenesis 29 (1): 147-56, 2008.18024477
Liang C, Li H, Zhou H, et al.: Recombinant Lz-8 from Ganoderma lucidum induces endoplasmic reticulum stress-mediated autophagic cell death in SGC-7901 human gastric cancer cells. Oncol Rep 27 (4): 1079-89, 2012.22179718
Wang JH, Zhou YJ, Zhang M, et al.: Active lipids of Ganoderma lucidum spores-induced apoptosis in human leukemia THP-1 cells via MAPK and PI3K pathways. J Ethnopharmacol 139 (2): 582-9, 2012.22172327
Chan WK, Cheung CC, Law HK, et al.: Ganoderma lucidum polysaccharides can induce human monocytic leukemia cells into dendritic cells with immuno-stimulatory function. J Hematol Oncol 1: 9, 2008.18644156
Pinweha S, Wanikiat P, Sanvarinda Y, et al.: The signaling cascades of Ganoderma lucidum extracts in stimulating non-amyloidogenic protein secretion in human neuroblastoma SH-SY5Y cell lines. Neurosci Lett 448 (1): 62-6, 2008.18938219
Stanley G, Harvey K, Slivova V, et al.: Ganoderma lucidum suppresses angiogenesis through the inhibition of secretion of VEGF and TGF-beta1 from prostate cancer cells. Biochem Biophys Res Commun 330 (1): 46-52, 2005.15781230
Liu DL, Li YJ, Yang DH, et al.: Ganoderma lucidum derived ganoderenic acid B reverses ABCB1-mediated multidrug resistance in HepG2/ADM cells. Int J Oncol 46 (5): 2029-38, 2015.25779097
Qu D, He J, Liu C, et al.: Triterpene-loaded microemulsion using Coix lacryma-jobi seed extract as oil phase for enhanced antitumor efficacy: preparation and in vivo evaluation. Int J Nanomedicine 9: 109-19, 2014.24379669
Li YB, Wang R, Wu HL, et al.: Serum amyloid A mediates the inhibitory effect of Ganoderma lucidum polysaccharides on tumor cell adhesion to endothelial cells. Oncol Rep 20 (3): 549-56, 2008.18695905
Joseph S, Sabulal B, George V, et al.: Antitumor and anti-inflammatory activities of polysaccharides isolated from Ganoderma lucidum. Acta Pharm 61 (3): 335-42, 2011.21945912
Gao Y, Tang W, Dai X, et al.: Effects of water-soluble Ganoderma lucidum polysaccharides on the immune functions of patients with advanced lung cancer. J Med Food 8 (2): 159-68, 2005.16117607
Sun LX, Li WD, Lin ZB, et al.: Protection against lung cancer patient plasma-induced lymphocyte suppression by Ganoderma lucidum polysaccharides. Cell Physiol Biochem 33 (2): 289-99, 2014.24525691
Oka S, Tanaka S, Yoshida S, et al.: A water-soluble extract from culture medium of Ganoderma lucidum mycelia suppresses the development of colorectal adenomas. Hiroshima J Med Sci 59 (1): 1-6, 2010.20518254

## Summary of the Evidence for Medicinal Mushrooms

To assist readers in evaluating the results of human studies of integrative, alternative, and complementary therapies for cancer, the strength of the evidence (i.e., the levels of evidence) associated with each type of treatment is provided whenever possible. To qualify for a level of evidence analysis, a study must:

- Be published in a peer-reviewed scientific journal.
- Report on a therapeutic outcome or outcomes, such as tumor response, improvement in survival, or measured improvement in quality of life.
- Describe clinical findings in sufficient detail that a meaningful evaluation can be made.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For an explanation of the scores and additional information about levels of evidence analysis of integrative, alternative, and complementary therapies for cancer, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

## Latest Updates to This Summary (11/06/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of medicinal mushrooms in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Medicinal Mushrooms. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/mushrooms-pdq. Accessed <MM/DD/YYYY>. [PMID: 27929633]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).